# Childhood Brain and Spinal Cord Tumors Summary Index (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides links to comprehensive, peer-reviewed, evidence-based information about the treatment of childhood brain and spinal cord tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Brain and Spinal Cord Tumors

Primary brain tumors are a diverse group of diseases that together constitute the most common solid tumor of childhood. The Central Brain Tumor Registry of the United States (CBTRUS) estimates that approximately 4,300 U.S. children are diagnosed each year.[1]

Brain tumors are classified by histology, but tumor location and extent of spread are also important factors that affect treatment and prognosis. Immunohistochemical analysis, cytogenetic and molecular genetic findings, and measures of proliferative activity are increasingly used in tumor diagnosis and classification.[2]

### References

Ostrom QT, Gittleman H, Farah P, et al.: CBTRUS statistical report: Primary brain and central nervous system tumors diagnosed in the United States in 2006-2010. Neuro Oncol 15 (Suppl 2): ii1-56, 2013.24137015
Louis DN, Perry A, Reifenberger G, et al.: The 2016 World Health Organization Classification of Tumors of the Central Nervous System: a summary. Acta Neuropathol 131 (6): 803-20, 2016.27157931

## Type of Childhood Brain and Spinal Cord Tumors

For information about the type of childhood brain and spinal cord tumor and its related PDQ summary, see the table below. If a tumor type is not listed, a corresponding PDQ treatment summary is not available.

CNS Tumor Type, Pathological Subtype, and Its Related PDQ Treatment Summary

Tumor Type (Based on the 2021 WHO Classification)^a^ | Pathological Subtype (Based on the 2021 WHO Classification)^a^ | Related PDQ Treatment Summary
Pediatric-type diffuse high-grade gliomas | Diffuse pediatric-type high-grade glioma, H3-wild type and IDH-wild type | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse high-grade gliomas | Diffuse midline glioma, H3 K27-altered | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse high-grade gliomas | Diffuse hemispheric glioma, H3 G34-mutant | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse high-grade gliomas | Infant-type hemispheric glioma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | Pilocytic astrocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | High-grade astrocytoma with piloid features | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | Subependymal giant cell astrocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | Pleomorphic xanthoastrocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | Choroid glioma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Circumscribed astrocytic gliomas | Astroblastoma, MN1-altered | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Ependymal tumors | Subependymoma | Childhood Ependymoma Treatment
Ependymal tumors | Myxopapillary ependymoma | Childhood Ependymoma Treatment
Ependymal tumors | Supratentorial ependymoma, NOS | Childhood Ependymoma Treatment
Ependymal tumors | Supratentorial ependymoma, ZFTA fusion–positive | Childhood Ependymoma Treatment
Ependymal tumors | Supratentorial ependymoma, YAP1 fusion–positive | Childhood Ependymoma Treatment
Ependymal tumors | Posterior fossa ependymoma, NOS | Childhood Ependymoma Treatment
Ependymal tumors | Posterior fossa group A (PFA) ependymoma | Childhood Ependymoma Treatment
Ependymal tumors | Posterior fossa group B (PFB) ependymoma | Childhood Ependymoma Treatment
Ependymal tumors | Spinal ependymoma, NOS | Childhood Ependymoma Treatment
Ependymal tumors | Spinal ependymoma, MYCN-amplified | Childhood Ependymoma Treatment
Pediatric-type diffuse low-grade glioma | Diffuse astrocytoma, MYB- or MYBL1-altered | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse low-grade glioma | Angiocentric glioma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse low-grade glioma | Polymorphous low-grade neuroepithelial tumor of the young | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Pediatric-type diffuse low-grade glioma | Diffuse low-grade glioma, MAPK pathway-altered | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Dysembryoplastic neuroepithelial tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Ganglioglioma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Gangliocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Desmoplastic infantile ganglioglioma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Desmoplastic infantile astrocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Diffuse glioneuronal tumor with oligodendroglioma-like features and nuclear clusters (provisional entity) | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Papillary glioneuronal tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Rosette-forming glioneuronal tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Myxoid glioneuronal tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Diffuse leptomeningeal glioneuronal tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Multinodular and vacuolating neuronal tumor | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Dysplastic cerebellar gangliocytoma (Lhermitte-Duclos disease) | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Extraventricular neurocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Cerebellar liponeurocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Glioneuronal and neuronal tumors | Central neurocytoma | Childhood Astrocytomas, Other Gliomas, and Glioneuronal/Neuronal Tumors Treatment
Tumors of the pineal region | Pineoblastoma | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Medulloblastoma, WNT-activated | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Medulloblastoma, SHH-activated and TP53-mutant; Medulloblastoma, SHH-activated and TP53-wildtype | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Medulloblastoma, non-WNT/non-SHH | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Medulloblastoma, histologically defined | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Desmoplastic nodular medulloblastoma | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Medulloblastoma with extensive nodularity | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Large cell medulloblastoma | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Anaplastic medulloblastoma | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Embryonal tumor with multilayered rosettes, C19MC-altered | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | CNS tumor with BCOR internal tandem duplication | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | CNS neuroblastoma, FOXR2-activated | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | CNS embryonal tumor, NEC/NOS | Childhood Medulloblastoma and Other Central Nervous System Embryonal Tumors Treatment
Embryonal tumors | Atypical teratoid/rhabdoid tumor | Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment
Germ cell tumors | Germinoma | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Embryonal carcinoma | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Yolk sac tumor | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Choriocarcinoma | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Mature teratoma | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Immature teratoma | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Teratoma with somatic-type malignancy | Childhood Central Nervous System Germ Cell Tumors Treatment
Germ cell tumors | Mixed germ cell tumor | Childhood Central Nervous System Germ Cell Tumors Treatment
Tumors of the sellar region | Adamantinomatous craniopharyngioma | Childhood Craniopharyngioma Treatment
Tumors of the sellar region | Papillary craniopharyngioma | Childhood Craniopharyngioma Treatment

CNS = central nervous system; NEC = not elsewhere classified; NOS = not otherwise specified; WHO = World Health Organization.

^a^WHO classification adapted from Louis et al.[1]

### References

Louis DN, Perry A, Wesseling P, et al.: The 2021 WHO Classification of Tumors of the Central Nervous System: a summary. Neuro Oncol 23 (8): 1231-1251, 2021.34185076

## Latest Updates to This Summary (12/19/2023)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed and extensively revised.

This summary was renamed from Childhood Brain and Spinal Cord Tumors Treatment Overview.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood brain and spinal cord tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Brain and Spinal Cord Tumors Summary Index are:

- Kenneth J. Cohen, MD, MBA (Sidney Kimmel Comprehensive Cancer Center at Johns Hopkins Hospital)
- Louis S. Constine, MD (James P. Wilmot Cancer Center at University of Rochester Medical Center)
- Roger J. Packer, MD (Children's National Hospital)
- D. Williams Parsons, MD, PhD (Texas Children's Hospital)
- Malcolm A. Smith, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Brain and Spinal Cord Tumors Summary Index. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/brain/hp/child-brain-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389453]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).